# Bile Duct Cancer (Cholangiocarcinoma) Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of bile duct cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## What Is Bile Duct Cancer (Cholangiocarcinoma)?

Bile duct cancer is a rare disease in which malignant (cancer) cells form in the bile ducts. Bile duct cancer is also called cholangiocarcinoma.

A network of tubes, called ducts, connects the liver, gallbladder, and small intestine. This network begins in the liver where many small ducts collect bile (a fluid made by the liver to break down fats during digestion). The small ducts come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct connects the gallbladder to the common hepatic duct. Bile from the liver passes through the hepatic ducts, common hepatic duct, and cystic duct and is stored in the gallbladder.

When food is being digested, bile stored in the gallbladder is released and passes through the cystic duct to the common bile duct and into the small intestine.

### Types of bile duct cancer

There are two types of bile duct cancer:

- Intrahepatic bile duct cancer: This type of cancer forms in the bile ducts inside the liver. Only a small number of bile duct cancers are intrahepatic. Intrahepatic bile duct cancers are also called intrahepatic cholangiocarcinomas.
  Anatomy of the intrahepatic bile ducts. Intrahepatic bile ducts are a network of small tubes that carry bile inside the liver. The smallest ducts, called ductules, come together to form the right and left hepatic ducts, which lead out of the liver. The two ducts join outside the liver and form the common hepatic duct. The cystic duct from the gallbladder joins the common hepatic duct to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Bile is made by the liver and stored in the gallbladder. When food is being digested, bile is released from the gallbladder and passes through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
  Anatomy of the intrahepatic bile ducts; drawing shows the liver and the intrahepatic bile ducts, which include the right and left hepatic ducts. Also shown is the common hepatic duct, gallbladder, cystic duct, common bile duct, pancreas, ampulla of Vater, and small intestine. An inset shows a cross section of a liver lobule with a network of bile ductules leading into a bile duct.
- Extrahepatic bile duct cancer: This type of cancer forms in the bile ducts outside the liver. The two types of extrahepatic bile duct cancer are perihilar bile duct cancer and distal bile duct cancer:
  - Perihilar bile duct cancer: This type of cancer is found in the area where the right and left bile ducts exit the liver and join to form the common hepatic duct. Perihilar bile duct cancer is also called a Klatskin tumor or perihilar cholangiocarcinoma.
  - Distal bile duct cancer: This type of cancer is found in the area where the ducts from the liver and gallbladder join to form the common bile duct. The common bile duct passes through the pancreas and ends in the small intestine. Distal bile duct cancer is also called extrahepatic cholangiocarcinoma.
  Anatomy of the extrahepatic bile ducts. Extrahepatic bile ducts are small tubes that carry bile from the liver and gallbladder to the small intestine. They are made up of the common hepatic duct (perihilar region) and the common bile duct (distal region). Bile is made in the liver and flows through the common hepatic duct and the cystic duct to the gallbladder, where it is stored. When food is being digested, bile is released from the gallbladder and flows through the common bile duct, pancreas, and ampulla of Vater into the small intestine.
  Anatomy of the extrahepatic bile ducts; drawing shows the extrahepatic bile ducts, including the common hepatic duct (perihilar region) and the common bile duct (distal region). Also shown are the liver, right and left hepatic ducts, gallbladder, cystic duct, pancreas, ampulla of Vater, and small intestine.

### Signs and symptoms of bile duct cancer

These and other signs and symptoms may be caused by bile duct cancer or by other conditions. Check with your doctor if you have any of the following:

- jaundice (yellowing of the skin or whites of the eyes)
- dark urine
- clay colored stool
- pain in the abdomen
- fever
- itchy skin
- nausea and vomiting
- weight loss for an unknown reason

There are no routine screening tests to check for bile duct cancer before signs and symptoms occur. To learn about tests that are used to diagnose bile duct cancer, see Bile Duct Cancer Diagnosis (https://www.cancer.gov/types/liver/bile-duct-cancer/diagnosis).

## Bile Duct Cancer Causes and Risk Factors

Anything that increases your chance of getting a disease is called a risk factor. There are several risk factors associated with bile duct cancer. Not everyone with one or more of these risk factors will develop the disease, and the disease will develop in some people who don’t have any known risk factors. People who think they may be at risk should discuss this with their doctor.

Risk factors for bile duct cancer include the following conditions:

- primary sclerosing cholangitis (a progressive disease in which the bile ducts become blocked by inflammation and scarring)
- chronic ulcerative colitis
- cysts in the bile ducts (cysts block the flow of bile and can cause swollen bile ducts, inflammation, and infection)
- infection with a Chinese liver fluke parasite

There are actions you can take that can help to decrease your risk of getting cancer. To learn more about ways to prevent cancer, see Cancer Prevention Overview.

## How is bile duct cancer diagnosed?

Procedures that make pictures of the bile ducts and the nearby area help diagnose bile duct cancer (cholangiocarcinoma) and show how far the cancer has spread. The process used to find out if cancer cells have spread within and around the bile ducts or to distant parts of the body is called staging.

In order to plan treatment, it is important to know if the bile duct cancer can be removed by surgery. Tests and procedures to detect, diagnose, and stage bile duct cancer are usually done at the same time. Every person will not receive all the tests described below.

The following tests and procedures may be used:

- Physical exam and health history: A physical exam of the body will be done to check a person's health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the person's health habits and past illnesses and treatments will also be taken.
- Liver function tests: During this procedure a blood sample is checked to measure the amounts of bilirubin and alkaline phosphatase released into the blood by the liver. A higher than normal amount of these substances can be a sign of liver disease that may be caused by bile duct cancer.
- Laboratory tests: These medical tests use samples of tissue, blood, urine, or other substances in the body in order to help diagnose disease, plan and check treatment, or monitor the disease over time.
- Carcinoembryonic antigen (CEA) and CA 19-9 tumor marker test: Tumor markers are released into the blood by organs, tissues, or tumor cells in the body. Increased levels of CEA and CA 19-9 may be a sign of bile duct cancer.
- Ultrasound exam: This procedure uses high-energy sound waves (ultrasound) that are bounced off internal tissues or organs, such as the abdomen, and make echoes. The echoes form a picture of body tissues called a sonogram.
- CT scan (CAT scan): This procedure uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the abdomen, taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Magnetic resonance imaging (MRI): This procedure uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body.
- Magnetic resonance cholangiopancreatography (MRCP): This procedure uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body such as the liver, bile ducts, gallbladder, pancreas, and pancreatic duct.

Different procedures may be used to obtain a sample of tissue and diagnose bile duct cancer. Cells and tissues are removed during a biopsy so they can be viewed under a microscope by a pathologist to check for signs of cancer. The type of procedure used depends on whether the person is well enough to have surgery.

Types of biopsy procedures include:

- Laparoscopy: This surgical procedure is done to look at the organs inside the abdomen, such as the bile ducts and liver, to check for signs of cancer. Small incisions (cuts) are made in the wall of the abdomen and a laparoscope (a thin, lighted tube) is inserted into one of the incisions. Other instruments may be inserted through the same or other incisions to perform procedures such as taking tissue samples to be checked for signs of cancer.
- Percutaneous transhepatic cholangiography (PTC): This procedure is used to x-ray the liver and bile ducts. A thin needle is inserted through the skin below the ribs and into the liver. Dye is injected into the liver or bile ducts and an x-ray is taken. A sample of tissue is removed and checked for signs of cancer. If the bile duct is blocked, a thin, flexible tube called a stent may be left in the liver to drain bile into the small intestine or a collection bag outside the body. This procedure may be used when a person cannot have surgery.
- Endoscopic retrograde cholangiopancreatography (ERCP): This procedure is used to x-ray the ducts (tubes) that carry bile from the liver to the gallbladder and from the gallbladder to the small intestine. Sometimes bile duct cancer causes these ducts to narrow and block or slow the flow of bile, causing jaundice. An endoscope (thin, tube-like instrument with a light and a lens for viewing) is passed through the mouth and stomach and into the small intestine. Dye is injected through the endoscope into the bile ducts and an x-ray is taken. A sample of tissue is removed and checked for signs of cancer. If the bile duct is blocked, a thin tube may be inserted into the duct to unblock it. This tube (or stent) may be left in place to keep the duct open. This procedure may be used when a person cannot have surgery.
- Endoscopic ultrasound (EUS): During this procedure an endoscope is inserted into the body, usually through the mouth or rectum. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. A sample of tissue is removed and checked for signs of cancer. This procedure is also called endosonography.

### What affects bile duct cancer prognosis?

Once bile duct cancer has been diagnosed, the prognosis (chance of recovery) and treatment options depend on:

- whether the cancer is in the upper or lower part of the bile duct system
- the stage of the cancer (whether it affects only the bile ducts or has spread to the liver, lymph nodes, or other places in the body)
- whether the cancer has spread to nearby nerves or veins
- whether the cancer can be completely removed by surgery
- whether the person has other conditions, such as primary sclerosing cholangitis
- whether the level of CA 19-9 is higher than normal
- whether the cancer has just been diagnosed or has recurred (come back)

Treatment options may also depend on the symptoms caused by the cancer. Bile duct cancer is usually found after it has spread and can rarely be completely removed by surgery. Palliative therapy may relieve symptoms and improve the person's quality of life.

## Bile Duct Cancer Stages

This page describes the stages of bile duct cancer (cholangiocarcinoma) for adults. The stage describes the extent of cancer in the body. Knowing the stage helps the doctor plan the best treatment. Bile duct cancer stages are described using the TNM staging system. To learn more about TNM and how cancer stages are described, see Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

To learn about the tests and procedures used to diagnose and stage bile duct cancer, see Bile Duct Cancer Diagnosis (https://www.cancer.gov/types/liver/bile-duct-cancer/diagnosis).

### Intrahepatic bile duct cancer

- Stage 0: In stage 0 intrahepatic bile duct cancer (carcinoma in situ), abnormal cells are found in the innermost layer of tissue lining the intrahepatic bile duct. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue.
- Stage I: Stage I intrahepatic bile duct cancer is divided into stages IA and IB.
  - In stage IA, cancer has formed in an intrahepatic bile duct and the tumor is 5 centimeters or smaller.
  - In stage IB, cancer has formed in an intrahepatic bile duct and the tumor is larger than 5 centimeters.
  Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).
  Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.
- Stage II: In stage II intrahepatic bile duct cancer, either of the following is found:
  - the tumor has spread through the wall of an intrahepatic bile duct and into a blood vessel; or
  - more than one tumor has formed in the intrahepatic bile duct and may have spread into a blood vessel.
- Stage III: Stage III intrahepatic bile duct cancer is divided into stages IIIA and IIIB.
  - In stage IIIA, the tumor has spread through the capsule (outer lining) of the liver.
  - In stage IIIB, cancer has spread to organs or tissues near the liver, such as the duodenum, colon, stomach, common bile duct, abdominal wall, diaphragm, or the part of the vena cava behind the liver, or the cancer has spread to nearby lymph nodes.
- Stage IV: In stage IV intrahepatic bile duct cancer, cancer has spread to other parts of the body, such as the bone, lungs, distant lymph nodes, or tissue lining the wall of the abdomen and most organs in the abdomen.

### Perihilar bile duct cancer

- Stage 0: In stage 0 perihilar bile duct cancer (carcinoma in situ), abnormal cells are found in the innermost layer of tissue lining the perihilar bile duct. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue. Stage 0 is also called high-grade dysplasia.
- Stage I: In stage I perihilar bile duct cancer, cancer has formed in the innermost layer of tissue lining the perihilar bile duct and has spread into the muscle layer or fibrous tissue layer of the perihilar bile duct wall.
- Stage II: In stage II perihilar bile duct cancer, cancer has spread through the wall of the perihilar bile duct to nearby fatty tissue or to liver tissue.
- Stage III: Stage III perihilar bile duct cancer is divided into stages IIIA, IIIB, and IIIC.
  - Stage IIIA: Cancer has spread to branches on one side of the hepatic artery or of the portal vein.
  - Stage IIIB: Cancer has spread to one or more of the following:
    - the main part of the portal vein or its branches on both sides
    - the common hepatic artery
    - the right hepatic duct and the left branch of the hepatic artery or of the portal vein
    - the left hepatic duct and the right branch of the hepatic artery or of the portal vein
  - Stage IIIC: Cancer has spread to 1 to 3 nearby lymph nodes.
- Stage IV: Stage IV perihilar bile duct cancer is divided into stages IVA and IVB.
  - Stage IVA: Cancer has spread to 4 or more nearby lymph nodes.
  - Stage IVB: Cancer has spread to other parts of the body, such as the liver, lung, bone, brain, skin, distant lymph nodes, or tissue lining the wall of the abdomen and most organs in the abdomen.

### Distal bile duct cancer

- Stage 0: In stage 0 distal bile duct cancer (carcinoma in situ), abnormal cells are found in the innermost layer of tissue lining the distal bile duct. These abnormal cells are not actually cancer but may become cancer and spread into nearby normal tissue. Stage 0 is also called high-grade dysplasia.
  Millimeters (mm). A sharp pencil point is about 1 mm, a new crayon point is about 2 mm, and a new pencil eraser is about 5 mm.
  Millimeters; drawing shows millimeters (mm) using everyday objects. A sharp pencil point shows 1 mm, a new crayon point shows 2 mm, and a new pencil-top eraser shows 5 mm.
- Stage I: In stage I distal bile duct cancer, cancer has formed and spread fewer than 5 millimeters into the wall of the distal bile duct.
- Stage II: Stage II distal bile duct cancer is divided into stages IIA and IIB.
  - Stage IIA: Cancer has spread
    - fewer than 5 millimeters into the wall of the distal bile duct and has spread to 1 to 3 nearby lymph nodes; or
    - 5 to 12 millimeters into the wall of the distal bile duct.
  - Stage IIB: Cancer has spread 5 millimeters or more into the wall of the distal bile duct. Cancer may have spread to 1 to 3 nearby lymph nodes.
- Stage III: Stage III distal bile duct cancer is divided into stages IIIA and IIIB.
  - Stage IIIA: Cancer has spread into the wall of the distal bile duct and to 4 or more nearby lymph nodes.
  - Stage IIIB: Cancer has spread to the large vessels that carry blood to the organs in the abdomen. Cancer may have spread to 1 or more nearby lymph nodes.
- Stage IV: In stage IV distal bile duct cancer, cancer has spread to other parts of the body, such as the liver, lungs, or tissue lining the wall of the abdomen and most organs in the abdomen.

For bile duct cancer, the following groups are used to plan treatment:

### Resectable (localized) bile duct cancer

The cancer is in an area, such as the lower part of the common bile duct or perihilar area, where it can be removed completely by surgery.

### Unresectable (including metastatic and recurrent) bile duct cancer

Unresectable cancer cannot be removed completely by surgery. Most people with bile duct cancer cannot have their cancer completely removed by surgery.

Metastasis is the spread of cancer from the primary site (place where it started) to other places in the body. Metastatic bile duct cancer may have spread to the liver, other parts of the abdominal cavity, or to distant parts of the body. To learn more about metastatic cancer, see Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

Recurrent bile duct cancer is cancer that has come back after treatment. The cancer may come back in the bile ducts, liver, or gallbladder. Less often, it may come back in distant parts of the body. To learn more about recurrent cancer, see Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer).

To learn about treatment options, see Bile Duct Cancer Treatment (https://www.cancer.gov/types/liver/bile-duct-cancer/treatment).

## Bile Duct Cancer Treatment

This page describes the different types of treatment for bile duct cancer (cholangiocarcinoma). Which of these treatments a person receives will depend on whether the cancer can be completely removed with surgery (resectable) or not (unresectable). To learn more, see treatment of resectable (https://www.cancer.gov/types/liver/bile-duct-cancer/treatment#_37) and treatment of unresectable (https://www.cancer.gov/types/liver/bile-duct-cancer/treatment#_46) bile duct cancer.

### Types of treatment

#### Surgery

The following types of surgery are used to treat bile duct cancer:

- Removal of the bile duct: This surgical procedure is done to remove part of the bile duct if the tumor is small and is in the bile duct only. Lymph nodes are removed and tissue from the lymph nodes is viewed under a microscope to see if there is cancer.
- Partial hepatectomy: This is a surgical procedure to remove the part of the liver where cancer is found. The part removed may be a wedge of tissue, an entire lobe, or a larger part of the liver, along with some normal tissue around it.
- Whipple procedure: During this surgical procedure the head of the pancreas, the gallbladder, part of the stomach, part of the small intestine, and the bile duct are removed. Enough of the pancreas is left to make digestive juices and insulin.

After the doctor removes all the cancer that can be seen at the time of the surgery, some people may receive chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after surgery to lower the risk that the cancer will come back is called adjuvant therapy. It is not yet known whether chemotherapy or radiation therapy given after surgery helps keep the cancer from coming back.

The following types of palliative surgery may be done to relieve symptoms caused by a blocked bile duct and improve quality of life:

- Biliary bypass: If cancer is blocking the bile duct and bile is building up in the gallbladder, a biliary bypass may be done. During this operation, the doctor will cut the gallbladder or bile duct in the area before the blockage and sew it to the part of the bile duct that is past the blockage or to the small intestine. This type of surgery creates a new pathway around the blocked area.
- Endoscopic stent placement: If the tumor is blocking the bile duct, surgery may be done to put in a stent (a thin, flexible tube) to drain bile that has built up in the area. The doctor may place the stent through a catheter that drains the bile into a bag on the outside of the body or the stent may go around the blocked area and drain the bile into the small intestine.
- Percutaneous transhepatic biliary drainage: This procedure is used to x-ray the liver and bile ducts. A thin needle is inserted through the skin below the ribs and into the liver. Dye is injected into the liver or bile ducts and an x-ray is taken. If the bile duct is blocked, a stent may be left in the liver to drain bile into the small intestine or a collection bag outside the body.

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. These are the main ways radiation might be given to treat bile duct cancer:

- External radiation therapy: A machine outside the body sends radiation toward the area of the body with cancer. Radiation is given in a series of treatments to allow healthy cells to recover and to make radiation more effective. The number of treatments is based on details about the cancer, such as the size and location of the tumor.
  It is not known whether external radiation therapy helps in the treatment of resectable bile duct cancer. In unresectable, metastatic, or recurrent bile duct cancer, new ways to improve the effect of external radiation therapy on cancer cells are being studied:
  - Hyperthermia therapy: Body tissue is exposed to high temperatures to make cancer cells more sensitive to the effects of radiation therapy and certain anticancer drugs.
  - Radiosensitizers: Drugs called radiosensitizers make cancer cells more sensitive to radiation therapy. Combining radiation therapy with radiosensitizers may kill more cancer cells.
- Internal radiation therapy: A radioactive substance is sealed in needles, seeds, wires, or catheters that are placed directly into or near the bile duct.

External and internal radiation therapy are used to treat bile duct cancer and may also be used as palliative therapy to relieve symptoms and improve quality of life.

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Chemotherapy

Chemotherapy uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. There are two main types of chemotherapy used to treat bile duct cancer.

- Systemic chemotherapy: When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body.
  Systemic chemotherapy is used to treat unresectable, metastatic, or recurrent bile duct cancer. The following chemotherapy drugs may be used:
  - gemcitabine and cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-CISPLATIN)
  - capecitabine and oxaliplatin (XELOX) (https://www.cancer.gov/about-cancer/treatment/drugs/XELOX)
  - gemcitabine and oxaliplatin (https://www.cancer.gov/about-cancer/treatment/drugs/GEMCITABINE-OXALIPLATIN) (GEMOX)
  - gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride) and capecitabine (https://www.cancer.gov/about-cancer/treatment/drugs/capecitabine)
- Regional chemotherapy: When chemotherapy is placed directly into an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas.
  Intra-arterial embolization is being studied in the treatment of unresectable, metastatic, or recurrent bile duct cancer. It is a procedure in which the blood supply to a tumor is blocked after anticancer drugs are given in blood vessels near the tumor. Sometimes, the anticancer drugs are attached to small beads that are injected into an artery that feeds the tumor. The beads block blood flow to the tumor as they release the drug. This allows a higher amount of drug to reach the tumor for a longer period of time, which may kill more cancer cells.

It is not known whether systemic chemotherapy helps in the treatment of resectable bile duct cancer.

To learn about the different ways chemotherapy works against cancer, what to expect when receiving chemotherapy, and how to manage chemotherapy side effects, see Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Liver transplant

In a liver transplant, the entire liver is removed and replaced with a healthy donated liver. A liver transplant may be done in people with perihilar bile duct cancer. If the person has to wait for a donated liver, other treatment is given as needed.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Your doctor may suggest biomarker tests to help predict your response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

The following targeted therapy drugs may be used to treat bile duct cancer:

- ivosidenib (https://www.cancer.gov/about-cancer/treatment/drugs/ivosidenib)
- pemigatinib (https://www.cancer.gov/about-cancer/treatment/drugs/pemigatinib)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Immunotherapy

Immunotherapy helps a person’s immune system fight cancer.

The following immunotherapy drugs may be used to treat bile duct cancer:

- durvalumab (https://www.cancer.gov/about-cancer/treatment/drugs/durvalumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy) and Immunotherapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/side-effects).

#### Clinical trials

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of resectable (localized) bile duct cancer

If the cancer has not spread and is in a place where surgery can be safely done, the tumor and some of the tissue around it will be removed. This lowers the chance of the cancer coming back. Chemotherapy with or without radiation therapy may be given after surgery.

Treatment of resectable intrahepatic bile duct cancer may include surgery to remove the cancer. A partial hepatectomy with or without embolization may be done before the surgery.

Treatment of resectable perihilar bile duct cancer may include:

- surgery to remove the cancer, which may include partial hepatectomy
- stent placement or percutaneous transhepatic biliary drainage, as palliative therapy to relieve jaundice and other symptoms and improve quality of life

Treatment of resectable distal bile duct cancer may include:

- surgery to remove the cancer, which may include a Whipple procedure
- stent placement or percutaneous transhepatic biliary drainage, as palliative therapy to relieve jaundice and other symptoms and improve quality of life

Adjuvant therapy for resectable bile duct cancer may include:

- chemotherapy
- external-beam radiation therapy
- a clinical trial of adjuvant therapy

### Treatment of unresectable bile duct cancer (including metastatic or recurrent disease)

Most people with bile duct cancer cannot have their cancer completely removed with surgery. This may be the case if the cancer has spread too far, the cancer is in a place that is too difficult to completely remove with surgery, or the patient is not healthy enough for surgery.

Treatment of unresectable bile duct cancer (including metastatic or recurrent disease) may include:

- stent placement or biliary bypass, as palliative treatment to relieve symptoms and improve quality of life
- external or internal radiation therapy, as palliative treatment to relieve symptoms and improve quality of life
- systemic chemotherapy
- immunotherapy (durvalumab (https://www.cancer.gov/about-cancer/treatment/drugs/durvalumab) or pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)) and systemic chemotherapy
- targeted therapy with pemigatinib (https://www.cancer.gov/about-cancer/treatment/drugs/pemigatinib)
- a clinical trial of various combinations of chemotherapy
- a clinical trial of immunotherapy or targeted therapy in people with mutations (changes) in certain genes